# Diffuse Intrinsic Pontine Glioma (DIPG)

Patient Version

This PDQ cancer information summary has current information about the treatment of diffuse intrinsic pontine glioma. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly, and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Pediatric Treatment Editorial Board.

## Diffuse Intrinsic Pontine Glioma (DIPG)

Diffuse intrinsic pontine glioma (DIPG) is a fast-growing type of brain tumor that starts in the part of the brain stem called the pons. The brain stem is the part of the brain above the back of the neck that is connected to the spinal cord. The pons controls many vital functions such as breathing, heart rate, and blood pressure, and the nerves and muscles used in seeing, hearing, walking, talking, and eating. DIPG is a glioma, meaning it starts in the brain stem's glial cells. Glial cells support and protect the brain's nerve cells.

In the United States, about 300 children are diagnosed with DIPG each year. DIPG primarily affects children between the ages of 5 and 10 years but can occur in younger children and teens. DIPG is rare in adults.

Anatomy of the brain. The supratentorial area (the upper part of the brain) contains the cerebrum, lateral ventricle and third ventricle (with cerebrospinal fluid shown in blue), choroid plexus, pineal gland, hypothalamus, pituitary gland, and optic nerve. The posterior fossa/infratentorial area (the lower back part of the brain) contains the cerebellum, tectum, fourth ventricle, and brain stem (midbrain, pons, and medulla). The skull and meninges protect the brain and spinal cord.

Anatomy of the brain; the right panel shows the supratentorial area (the upper part of the brain) and the posterior fossa/infratentorial area (the lower back part of the brain). The supratentorial area contains the cerebrum, lateral ventricle and third ventricle (with cerebrospinal fluid shown in blue), choroid plexus, pineal gland, hypothalamus, pituitary gland, and optic nerve. The posterior fossa/infratentorial area contains the cerebellum, tectum, fourth ventricle, and brain stem (midbrain, pons, and medulla). The spinal cord is also shown. The left panel shows the cerebrum, ventricles (fluid-filled spaces), meninges, skull, cerebellum, brain stem (pons and medulla), and spinal cord.

### Causes and risk factors for DIPG

DIPG is caused by certain changes to the way glial cells function, especially how they grow and divide into new cells. Often, the exact cause of the cell changes that lead to DIPG is unknown. To learn more about how cancer develops, see What Is Cancer? (https://www.cancer.gov/about-cancer/understanding/what-is-cancer)

A risk factor is anything that increases the chance of getting a disease. There are no known risk factors for DIPG.

### Symptoms of DIPG

The symptoms of DIPG depend on:

- where the tumor forms in the brain
- the size of the tumor and whether it has spread throughout the brain stem
- how fast the tumor grows
- your child's age and stage of development

DIPG symptoms appear rapidly. It's important to check with your child's doctor immediately if your child has:

- trouble with eye movement (the eye is turned inward)
- vision problems
- problems with talking, chewing, and swallowing
- drooping on one side of the face
- morning headache or headache that goes away after vomiting
- nausea and vomiting
- weakness in the arms or legs
- loss of balance and trouble walking
- changes in behavior
- trouble learning in school

These symptoms may be caused by problems other than DIPG. The only way to know for sure is to see your child's doctor.

### Tests to diagnose DIPG

If your child has symptoms that suggest a DIPG, their doctor will need to find out if these are due to DIPG or some other problem. The doctor will ask when the symptoms started and how often your child has been having them. They will also ask about your child's personal and family medical history and do a physical exam, including a neurological exam. Depending on these results, they may recommend other tests. If your child is diagnosed with DIPG, the results of these tests will help you and your child's doctor plan treatment.

The tests and procedures used to diagnose a DIPG may include:

#### Magnetic resonance imaging (MRI) with or without gadolinium

MRI uses a magnet, radio waves, and a computer to make a series of detailed pictures of areas inside the brain. A substance called gadolinium is injected into a vein. The gadolinium collects around the cancer cells so they show up brighter in the picture. This procedure is also called nuclear magnetic resonance imaging (NMRI).

Magnetic resonance imaging (MRI) scan. The child lies on a table that slides into the MRI machine, which takes a series of detailed pictures of areas inside the body. The positioning of the child on the table depends on the part of the body being imaged.

Magnetic resonance imaging (MRI) scan; drawing shows a child lying on a table that slides into the MRI machine, which takes a series of detailed pictures of areas inside the body.

#### Biopsy

Your child's doctor will discuss whether a biopsy is an option. A biopsy is a procedure in which a surgeon removes a sample of tumor tissue from the pons. A stereotactic biopsy, which involves using an imaging technique to help precisely find and remove the tumor tissue, is usually done. A pathologist will study the biopsy sample and provide the results of their analysis in a pathology report. If the pathologist finds that your child has DIPG, the pathology report will provide information about the cancer that can help guide treatment decisions.

Craniotomy. An opening is made in the skull and a piece of the skull is removed to show part of the brain.

Drawing of a craniotomy showing a section of the scalp that has been pulled back to remove a piece of the skull; the dura covering the brain has been opened to expose the brain. The layer of muscle under the scalp is also shown.

#### Immunohistochemistry

Immunohistochemistry is a laboratory test that uses antibodies to check for certain antigens (markers) in a sample of a patient’s tissue. The antibodies are usually linked to an enzyme or a fluorescent dye. After the antibodies bind to a specific antigen in the tissue sample, the enzyme or dye is activated, and the antigen can then be seen under a microscope. This type of test is used to help diagnose cancer and to help tell one type of cancer from another type.

### Getting a second opinion

You may want to get a second opinion to confirm your child’s diagnosis and treatment plan. If you seek a second opinion, you will need to get medical test results and reports from the first doctor to share with the second doctor. The second doctor will review the pathology report, slides, and scans. They may agree with the first doctor, suggest changes to the treatment plan, or provide more information about your child’s cancer.

To learn more about choosing a doctor and getting a second opinion, see Finding Cancer Care (https://www.cancer.gov/about-cancer/managing-care/finding-cancer-care). You can contact NCI's Cancer Information Service (https://www.cancer.gov/contact) via chat, email, or phone (both in English and Spanish) for help finding a doctor or hospital that can provide a second opinion. For questions you might want to ask at your child's appointments, see Questions to Ask Your Doctor (https://www.cancer.gov/about-cancer/coping/questions).

### Who treats children with DIPG?

A pediatric oncologist, a doctor who specializes in treating children with cancer, oversees treatment for DIPG. The pediatric oncologist works with other health professionals who are experts in treating children with brain tumors and also specialize in other areas of medicine. Other specialists may include:

- pediatrician
- neurosurgeon
- neuropathologist
- pediatric radiation oncologist
- neuro-oncologist
- neurologist
- neuroradiologist
- endocrinologist
- psychologist
- rehabilitation specialist
- social worker
- child-life specialist

### Types of treatment for DIPG

There are different types of treatment for children and adolescents with DIPG. You and your child's care team will work together to decide treatment. Many factors will be considered, such as your child's overall health and whether the cancer is newly diagnosed or has come back.

Your child's treatment plan will include information about the cancer, the goals of treatment, treatment options, and the possible side effects. It will be helpful to talk with your child’s cancer care team before treatment begins about what to expect. For help every step of the way, see our booklet, Children with Cancer: A Guide for Parents (https://www.cancer.gov/publications/patient-education/guide-for-parents).

Types of treatment your child might have include:

#### Radiation therapy

Radiation therapy uses high-energy x-rays or other types of radiation to kill cancer cells or keep them from growing. DIPG is treated with external-beam radiation therapy. This type of radiation therapy uses a machine outside the body to send radiation toward the area of the body with cancer.

Several months after radiation therapy to the brain, imaging tests may show changes to the brain tissue. These changes may be caused by the radiation therapy or may mean the tumor is growing. It is important to be sure the tumor is growing before any more treatment is given.

To learn more, see External-Beam Radiation Therapy for Cancer (https://www.cancer.gov/about-cancer/treatment/types/radiation-therapy/external-beam) and Radiation Therapy Side Effects (https://www.cancer.gov/about-cancer/treatment/types/radiation-therapy/side-effects).

#### Chemotherapy

Chemotherapy (also called chemo) uses drugs to stop the growth of cancer cells. Chemotherapy either kills the cancer cells or stops them from dividing.

To treat a DIPG in infants, chemotherapy is taken by mouth or injected into a vein. When given this way, the drugs enter the bloodstream and can reach cancer cells throughout the body. Chemotherapy drugs that cross the blood-brain barrier and reach tumor cells in the brain are used.

Because radiation therapy to the brain can affect growth and brain development in young children, chemotherapy may be given to delay or reduce the need for radiation therapy.

To learn more, see Chemotherapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/chemotherapy).

#### Surgery to place a shunt

Sometimes children with a DIPG have increased fluid around the brain or spinal cord. They may need surgery to place a shunt (long, thin tube) in a ventricle (fluid-filled space) of the brain and thread it under the skin to another part of the body, usually the abdomen. The shunt carries extra fluid away from the brain so it may be absorbed elsewhere in the body. This decreases the fluid and pressure on the brain or spinal cord.

A cerebrospinal fluid (CSF) shunt (a long, thin tube) carries extra CSF away from the brain so it may be absorbed elsewhere in the body. The shunt is placed in a ventricle (fluid-filled space) in the brain and threaded under the skin to another part of the body, usually the abdomen. The shunt has a valve that controls the flow of CSF.

Drawing shows extra cerebrospinal fluid (CSF) flowing through a shunt (a long, thin tube) from a ventricle (fluid-filled space) in the brain into the abdomen. The shunt goes from the ventricle, under the skin in the neck and chest, and into the abdomen. Also shown is a shunt valve that controls the flow of CSF.

#### Clinical trials

A treatment clinical trial is a research study meant to help improve current treatments or obtain information on new treatments for patients with cancer. Because cancer in children is rare, taking part in a clinical trial should be considered.

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. Some clinical trials are open only to patients who have not started treatment. Clinical trials supported by other organizations can be found on the ClinicalTrials.gov website.

To learn more, see Clinical Trials Information for Patients and Caregivers (https://www.cancer.gov/research/participate/clinical-trials).

#### Treatment of DIPG

Palliative care is an important part of your child's treatment plan throughout their cancer journey. It includes physical, psychological, social, and spiritual support for your child and family. The goal of palliative care is to help control symptoms and give your child the best quality of life possible.

Treatment of newly diagnosed childhood DIPG may include:

- external-beam radiation therapy
- chemotherapy (to treat infants)

Treatment of DIPG that is progressive (getting worse) or has come back after treatment may include radiation therapy, if the cancer responded when first treated with radiation therapy.

### Prognosis and prognostic factors for DIPG

If your child has been diagnosed with DIPG, you likely have questions about your child's chances of survival. The likely outcome or course of a disease is called prognosis.

Doctors consider these and other factors when making a prognosis for DIPG:

- where the tumor is found in the brain and if it has spread within the brain stem
- your child's age at diagnosis
- how long your child has had symptoms prior to diagnosis
- whether the tumor has a certain change to H3 K27m

DIPG is a challenging cancer to treat because of its location in the brain, how fast it progresses, and the way it spreads into healthy tissue. Unfortunately, most children with DIPG do not live longer than 2 years after diagnosis. Your child's cancer care team is in the best position to talk with you about your child's prognosis.

### Follow-up care

As your child goes through treatment, they will have follow-up tests or check-ups. Some of the tests that were done to diagnose the cancer may be repeated to see how well the treatment is working. Decisions about whether to continue, change, or stop treatment may be based on the results of these tests.

Some of the tests will continue to be done from time to time after treatment has ended. The results of these tests can show if your child's condition has changed or if the cancer has come back. If the results of imaging tests done after treatment for DIPG show a mass in the brain, a biopsy may be done to find out if it is made up of dead tumor cells or if new cancer cells are growing.

### Coping with your child's cancer

When your child has cancer, every member of the family needs support. Taking care of yourself during this time is important. Talk with your child's treatment team and people in your family and community for support with coping with the emotional and physical stress that comes with a cancer diagnosis. To learn more, see Support for Families When a Child Has Cancer (https://www.cancer.gov/about-cancer/coping/caregiver-support/parents) and the booklet Children with Cancer: A Guide for Parents (https://www.cancer.gov/publications/patient-education/guide-for-parents).

### Related resources

For more childhood cancer information and other general cancer resources, see:

- Pediatric Brain Tumor Consortium (PBTC) (https://www.pbtc.org/)
- About Cancer (https://www.cancer.gov/about-cancer)
- Childhood Cancers (https://www.cancer.gov/types/childhood-cancers)
- CureSearch for Children's Cancer (http://www.curesearch.org/)
- Adolescents and Young Adults with Cancer (https://www.cancer.gov/types/aya)
- Cancer in Children and Adolescents (https://www.cancer.gov/types/childhood-cancers/child-adolescent-cancers-fact-sheet)
- For Survivors and Caregivers (https://cancercontrol.cancer.gov/ocs/resources/survivors.html)
- Last Days of Life